# Grief, Bereavement, and Coping With Loss (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about how individuals cope with grief, bereavement, and mourning. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Health care providers will encounter bereaved individuals throughout their personal and professional lives.[1] Individual diversity, family and social networks, and micro- and macrocultural influences contribute to the way one experiences and expresses grief. The progression from advanced cancer to death is experienced in different ways by different people. Most people will experience common or normal grief and will, with time, adjust to the loss; others will experience more severe grief reactions such as prolonged or complicated grief and will benefit from treatment. Some may even find that the cancer experience, although it is difficult and trying, may lead to significant personal growth for the patient and others in the patient’s family and social network.

Multiple factors may influence how an individual or a social network adjusts to a death. How people grieve depends on the personality of the grieving individual and his or her relationship with the person who died. The following factors affect how a person will express grief externally and adjust to the loss internally:[2]

- The cancer experience.
- Manner of disease progression.
- Cultural and religious beliefs.
- Sociocultural structure in which the grieving process occurs.
- Coping skills.
- Psychiatric history.
- Availability of support systems.
- Socioeconomic status.

Even the sense of a relationship’s completeness can influence the grieving process.[2] The effect of grief on the patients themselves and on the loss of their future should also be considered by providers and patients’ social networks.

This summary first defines the constructs of grief, mourning, and bereavement. It then distinguishes the grief reactions of anticipatory grief, prolonged complicated grief, normal or common grief, models of normal grief, and complicated or prolonged grief. Psychosocial and pharmacological treatments are explained. The important developmental issues of children and grief are presented, and a section on cross-cultural responses to grief and mourning concludes the summary.

The following information combines theoretical and empirical reviews of the general literature on grief, bereavement, and mourning [3-6] and is not specific to loss via cancer. Where available, studies that have focused on cancer are emphasized.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Casarett D, Kutner JS, Abrahm J, et al.: Life after death: a practical approach to grief and bereavement. Ann Intern Med 134 (3): 208-15, 2001.11177334 21091601
Yamashita R, Arao H, Takao A, et al.: Unfinished Business in Families of Terminally Ill With Cancer Patients. J Pain Symptom Manage 54 (6): 861-869, 2017.28807700
Stroebe MS, Hansson RO, Schut H, et al., eds.: Handbook of Bereavement Research and Practice: Advances in Theory and Intervention. American Psychological Association, 2008.
Stroebe MS, Hansson RO, Stroebe W, et al., eds.: Handbook of Bereavement Research: Consequences, Coping, and Care. American Psychological Association, 2001.
Bonanno GA, Kaltman S: The varieties of grief experience. Clin Psychol Rev 21 (5): 705-34, 2001.11434227
Jacobs S: Pathologic Grief: Maladaptation to Loss. American Psychiatric Press, Inc., 1993.

## Definitions of Terms

### Grief

Grief is defined as the primarily emotional/affective process of reacting to the loss of a loved one through death.[1] The focus is on the internal, intrapsychic process of the individual. Normal or common grief reactions may include components such as the following:[2]

- Numbness and disbelief.
- Anxiety from the distress of separation.
- A process of mourning often accompanied by symptoms of depression.
- Eventual recovery.

Grief reactions can also be viewed as abnormal, traumatic, pathologic, or complicated. Although no consensus has been reached, diagnostic criteria for complicated grief have been proposed.[3] For more information, see the Prolonged, Persistent, or Complex Grief section.

### Mourning

Mourning is defined as the public display of grief.[1] While grief focuses more on the internal or intrapsychic experience of loss, mourning emphasizes the external or public expressions of grief. Consequently, mourning is influenced by one’s beliefs, religious practices, and cultural context.

There is obvious overlap between grief and mourning, with each influencing the other; it is often difficult to distinguish between the two. The public expression (i.e., mourning) of the emotional distress over the loss of a loved one (i.e., grief) is influenced by culturally determined beliefs, mores, and values.

### Bereavement

Bereavement is defined as the objective situation one faces after having lost an important person via death.[1] Bereavement is conceptualized as the broadest of the three terms defined in this section and as a statement of the objective reality of a situation of loss via death.

### References

Stroebe MS, Hansson RO, Schut H, et al., eds.: Handbook of Bereavement Research and Practice: Advances in Theory and Intervention. American Psychological Association, 2008.
Jacobs S: Pathologic Grief: Maladaptation to Loss. American Psychiatric Press, Inc., 1993.
Prigerson HG, Jacobs SC: Perspectives on care at the close of life. Caring for bereaved patients: "all the doctors just suddenly go". JAMA 286 (11): 1369-76, 2001.11560543

## Types of Grief Reactions

Researchers and clinicians have proposed models for grief and types of grief reactions.[1,2] Research has focused on normal and complicated grief while specifying types of complicated grief [3] and available empirical support,[4] with a focus on the characteristics of different types of dysfunction.[1] Research has noted that while there may be phases or domains of grief, there is not a preestablished linear process through which an individual moves to resolve the grief.[5,6] Most literature attempts to distinguish between normal grief and various forms of complicated grief such as chronic grief or grief that is absent, delayed, or inhibited.[1,3,4]

Bereavement research has tried to identify these patterns by reviewing available empirical support [1] while also looking for evidence that these grief reactions are unique and not simply forms of major depression, anxiety, or post-traumatic stress.[7]

### Anticipatory Grief

Anticipatory grief refers to a grief reaction that occurs in anticipation of an impending loss.[8] Anticipatory grief is becoming increasingly recognized as an issue that can heighten distress for both patients and their social networks. The term anticipatory grief is most often used when discussing the families of dying persons, although dying individuals themselves can experience anticipatory grief. Anticipatory grief includes many of the same symptoms of grief after a loss. Anticipatory grief has been defined as “the total set of cognitive, affective, cultural, and social reactions to expected death felt by the patient and family.”[9]

Anticipatory grief has been empirically associated with escalated distress, pain, and medical complications.[10] When anticipatory grief needs are met, individuals are less likely to experience these negative outcomes at the end of life.[11]

- Fallacy #1: Anticipatory grief affects everyone. Anticipatory grief cannot be assumed to be present merely because a warning of life-threatening illness has been given or because sufficient time has elapsed from the onset of illness until death. Approximately 25% of patients with incurable cancer experience anticipatory grief.[10]
- Fallacy #2: Anticipatory grief is the same as conventional grief, just starting earlier. A major misconception is that anticipatory grief is merely conventional (postdeath) grief that begins earlier. There is not a fixed volume of grief to be experienced, implying that the amount of grief experienced in anticipation of the loss will decrease the remaining grief that will need to be experienced after the death.[12]
- Fallacy #3: Only a patient’s family members can experience anticipatory grief; the patient experiences depression. While these domains may overlap, they have distinctly separate properties for both patients and members of their social networks. Anticipatory grief and depression can be assessed and treated as separate mental health issues by using measures specifically developed for anticipatory grief.[11,13]
- Fallacy #4: Different types of grief can be treated the same. Clinical data from several studies [14,15] showed that grief following an unanticipated death differs from anticipatory grief.
- Fallacy #5: We cannot predict who is likely to experience anticipatory grief. A number of risk factors and protective factors relative to anticipatory grief have been identified. Anticipatory grief is more likely to occur among individuals with dependent relationships, limited external social support, or even discomfort with close relationships. People with lower levels of education, those with neuroticism, or those undergoing a spiritual crisis are also more likely to be at risk of developing anticipatory grief.[16] However, anticipatory grief is less likely to occur when the death is accepted by the patient and the patient’s social network. When death acceptance rates are higher, there is decreased anxiety, depression, and anticipatory grief.[17] Therefore, assessment for risk and treatment, as needed, using psychotherapy to address death acceptance may be useful to patients and their social networks.

One study reported that parents who felt prepared for their child’s end of life had improved social functioning in the first 2 years of their bereavement.[18]

### Normal or Common Grief

In general, normal or common grief reactions are marked by a gradual movement toward an acceptance of the loss and, although daily functioning can be very difficult, managing to continue with basic daily activities. Normal or common grief appears to occur in 50% to 85% of persons after they have experienced a loss.[19] Normal grief usually includes some common emotional reactions that include emotional numbness, shock, disbelief, and/or denial often occurring immediately after the death, particularly if the death is unexpected. Much emotional distress is focused on the anxiety of separation from the loved one, which often results in yearning, searching, preoccupation with the loved one, and frequent intrusive images of death.[2]

Such distress can be accompanied by:[2]

- Crying.
- Sighing.
- Having dreams, illusions, and even hallucinations of the deceased.
- Seeking out things or places associated with the deceased.

Some bereaved people will experience anger, protest the reality of the loss, and have significant periods of the following:[2]

- Sadness.
- Despair.
- Insomnia.
- Anorexia.
- Fatigue.
- Guilt.
- Loss of interest.
- Disorganization in daily routine.

Many bereaved persons will experience highly intense, time-limited periods (e.g., 20–30 minutes) of distress, variously called grief bursts, pangs, or waves. Sometimes these pangs are reactions to reminders of the deceased, such as major cultural or social holidays, the anniversary of the patient’s death, or giving away items that belonged to the individual. However, at other times, the pangs may occur unexpectedly.[2]

Over time, most bereaved people will experience symptoms less frequently, with briefer duration, or with less intensity. Although there is no clear agreement on any specific time period needed for recovery, most bereaved persons experiencing normal grief will note a lessening of symptoms after about 6 months. However, there may be a significant difference between the expression of grief and the experience of grief. Time lines related to the expression of grief:

- May be socially, religiously, or culturally influenced (e.g., wearing mourning clothes, sitting shiva, or lowering a flag).
- Are time-limited.
- Begin soon after a loss.
- Largely resolve within 1 or 2 years.

### Models of Normal Grief

A number of theoretically derived models of normal grief have been proposed.[20-23] Most models hypothesize a normal grief process differentiated from various types of complicated grief. Some models have organized grief-related symptoms into phases or stages, suggesting that grief is a process marked by a series of phases with predominant characteristics. The most well-known model was developed for medical student education and used a series of clinical interviews with terminally ill patients.[24] In this model, the five stages of grief were identified as denial, anger, bargaining, depression, and acceptance. However, this model has limited empirical support.[25] After initial development, the model was reconceptualized from stages of grief to domains of grief, with the understanding that an individual may move back and forth among the domains without any expectation of a predefined path or progression that is implied by the term stages.[26]

In a 2-year study of the stage theory of grief, results suggested that a more common pathway is disbelief, yearning, anger, depression, and acceptance, and that these negative psychosocial issues peak at approximately 6 months postloss.[5]

An adapted stage model of normal grief [2] organizes psychological responses into four stages:[2]

- Numbness-disbelief.
- Separation distress (yearning-anger-anxiety).
- Depression-mourning.
- Recovery.

Although presented as a stage model, this model explains “it is important to emphasize that the idea that grief unfolds inexorably in regular phases is an oversimplification of the highly complex personal waxing and waning of the emotional process.”[2]

Another theory proposes the following four stages:[15,27-29]

- Shock-numbness.
- Yearning-searching.
- Disorganization-despair.
- Reorganization.

Bereavement researchers have found empirical support for this four-stage model,[5] with particular emphasis on the timing of grief. Primary grief indicators peak at approximately 6 months postloss, after which the negative grief indicators begin to decline. This suggests that individuals who are still experiencing elevated levels of grief after that time may benefit from an escalated response from mental and physical health care providers.

Other researchers have conceptualized grief as tasks rather than stages. One investigator identified four tasks of mourning that help an individual continue to feel in control of his or her world, despite the destabilization that occurs with a loss.[30] Also outlined are six mediators that influence how well someone is able to complete the tasks. These tasks include the following:[31]

- Accepting the reality of the loss.
- Processing the pain of grief.
- Adjusting to the world without the deceased.
- Finding an enduring connection with the deceased while continuing to engage in new relationships.

In this model, the tasks may occur in any order without a fixed progression; however, for successful mourning to occur, the person must be able to achieve all four tasks.

### Differentiating Normal Grief Reaction From Major Depressive Disorder

There is a significant overlap between the behavioral manifestations associated with the grieving process and symptoms of depression such as insomnia, feelings of guilt, ruminations, and lack of motivation. The fourth revised edition of the Diagnostic and Statistical Manual of Mental Disorders (DSM-IV-TR) advised clinicians to refrain from diagnosing major depression in individuals within the first 2 months following the death of a loved one in what was referred to as the “bereavement exclusion.” The fifth edition of the DSM (DSM-5) eliminated the bereavement exclusion in the diagnosis of major depression.[32] This change was added to recognize that in vulnerable individuals, grief can precipitate major depression within a short time and can be potentially lethal.

DSM-5 carefully outlines the features of a normal grieving process as compared with a major depressive episode, as follows:[32]

- In grief, painful feelings come in waves, lessen in intensity and frequency over time, and are often intermixed with positive memories of the deceased; in depression, mood and ideation are constantly negative.
- In grief, the prevailing affect is one of emptiness; in major depression, it is a long, sustained, depressed mood and an inability to expect pleasure or happiness.
- In grief, self-esteem is usually preserved; in major depression, feelings of worthlessness and self-loathing are common.
- In grief, while symptoms such as suicidal ideation can occur, they are generally focused on the deceased, such as a wish to join the deceased in death or feelings of guilt toward certain gaps or failures in the relationship with the deceased. In major depression, suicidal ideation is more likely directed at self only.

DSM-5 emphasizes that although depression is a normal consequence of bereavement, major depression should not be diagnosed in the context of a normal grieving process. It also emphasizes that major depression can and should be diagnosed when symptoms and features of depression are present and clearly distinguishable from a normal grieving process. DSM-5 also created a candidate disorder, persistent complex bereavement disorder, recognizing the presence of a prolonged and complicated grief reaction in vulnerable individuals.[32] This complicated grief reaction is recognized in the International Classification of Diseases and Related Health Problems, 11th Revision (ICD-11 (https://icd.who.int/)), as prolonged grief disorder.

### Patterns of Complicated Grief

Many authors throughout history have proposed various patterns of normal grief compared with pathologic or complicated grief.[1,2] Some proposed patterns come from extensive clinical observation [33] supported by various theories (e.g., personality traits associated with patterns of attachment).[34]

These patterns are described in comparison with normal grief and highlight deviations from the normal patterns. Authors have developed a wide variety of theories and descriptive labels for abnormal grief patterns, but these labels have very limited empirical validity:

- Inhibited or absent grief: A pattern in which persons show little evidence of the expected separation distress, seeking, yearning, or other characteristics of normal grief.
- Delayed grief: A pattern in which symptoms of distress, seeking, yearning, etc., occur at a much later time than is typical.
- Chronic grief: A pattern emphasizing prolonged duration of grief symptoms.
- Distorted grief: A pattern characterized by extremely intense or atypical symptoms.

Empirical reviews have not found evidence of inhibited, absent, or delayed grief and instead emphasize the possibility that these patterns are better explained as forms of human resilience and strength.[6] Evidence supports the existence of a minimal grief reaction—a pattern in which persons experience no, or only a few, signs of overt distress or disruption in functioning. This minimal reaction is thought to occur in approximately 15% of persons during the first 1 or 2 years after a loss.[6] This minimal reaction may be particularly apparent in someone who has a mixed relationship with the deceased, or in someone who has intellectual disabilities or emotional expression difficulties, such as autism spectrum disorder.[35] An observed minimal grief reaction should be interpreted with caution because the expression of grief may not adequately reflect the internal experience of grief.

Empirical support also exists for chronic or complicated grief, a pattern of responding in which persons experience symptoms of common grief but do so for a much longer time than the typical 1 or 2 years. Chronic or complicated grief is thought to occur in about 15% to 30% of bereaved persons.[6] It may look very much like major depression, generalized anxiety, and possibly post-traumatic stress. However, these terms have fallen out of favor in the treatment community, replaced by the updated and more specific diagnostic criteria of DSM-5 (persistent complex bereavement disorder) and ICD-11 (prolonged grief disorder).[36]

### Prolonged, Persistent, or Complex Grief

DSM-5 and ICD-11 include bereavement as a diagnosable code:

- Persistent complex bereavement disorder, when elevated grief continues for 12 months for adults and 6 months for children (DSM-5).
- Prolonged grief disorder, when elevated grief continues 6 months after the death (ICD-11).

There has been some concern that the DSM-5 diagnosis of depression removed bereavement as a rule-out, opening the door for medicating bereavement as soon as 2 weeks postloss. However, depression and prolonged grief are two distinct diagnoses and appear to respond uniquely to treatment.[37,38] For more information, see the Treatment section.

Complicated grief differs from normal and uncomplicated grief, not in terms of the nature of the grief reaction, but in terms of the distress and disability caused by these reactions and their persistence and pervasiveness.[39]

Following are the proposed DSM-5 diagnostic criteria for the prolonged and complicated grief reaction termed persistent complex bereavement disorder.[40]

- Event: Person has experienced the death of someone close at least 12 months previously.
- In response to the death, the person experiences at least one of the following symptoms frequently and to a clinically significant degree:
  - Intense sorrow and emotional pain.
  - Yearning or longing for the deceased.
  - Preoccupation with the deceased.
  - Preoccupation with circumstances of the death.
- In response to the death, at least six of the following symptoms occur frequently and to a clinically significant degree:
  - Difficulty accepting the death.
  - Disbelief or numbness.
  - Difficulty in reminiscing positively about the deceased.
  - Bitterness or anger.
  - Maladaptive appraisals about self, associated with the loss (e.g., self-blame).
  - Excessive avoidance of stimuli reminding of the loss.
  - A desire to die, to be with the deceased.
  - Difficulty trusting other people.
  - Feeling alone or detached from others.
  - Feeling that life is empty or meaningless.
  - Confusion about one’s role and diminished identity.
  - Difficulty pursuing interests or making plans for the future.
- Impairment: The disturbance causes clinically significant impairment in social, occupational, or other important areas of functioning.
- Reactions are out of proportion to or inconsistent with cultural or religious norms.

While some of the DSM and ICD diagnostic criteria for this disorder differ slightly, a number of key domains overlap, including separation distress, elevated focus on the deceased, difficulty with acceptance of the death, and disengagement from future-oriented goals.

Quality engagement at the cancer patient’s end of life appears to be critical for decreasing the likelihood of survivors developing prolonged grief disorder or persistent complex bereavement disorder. Achieving acceptance of the death, and engaging in a meaningful goodbye, is more important than the survivor being physically present at the time of the patient’s death.[41] With a traumatic or unexpected death, the lack of meaningful communication at the end of life may contribute to a survivor’s elevated prolonged grief disorder or persistent complex bereavement disorder.[42]

### References

Bonanno GA, Kaltman S: The varieties of grief experience. Clin Psychol Rev 21 (5): 705-34, 2001.11434227
Jacobs S: Pathologic Grief: Maladaptation to Loss. American Psychiatric Press, Inc., 1993.
Stroebe MS, Hansson RO, Schut H, et al., eds.: Handbook of Bereavement Research and Practice: Advances in Theory and Intervention. American Psychological Association, 2008.
Stroebe MS, Hansson RO, Stroebe W, et al., eds.: Handbook of Bereavement Research: Consequences, Coping, and Care. American Psychological Association, 2001.
Maciejewski PK, Zhang B, Block SD, et al.: An empirical examination of the stage theory of grief. JAMA 297 (7): 716-23, 2007.17312291
Bonanno GA: Loss, trauma, and human resilience: have we underestimated the human capacity to thrive after extremely aversive events? Am Psychol 59 (1): 20-8, 2004.14736317
Bonanno GA, Neria Y, Mancini A, et al.: Is there more to complicated grief than depression and posttraumatic stress disorder? A test of incremental validity. J Abnorm Psychol 116 (2): 342-51, 2007.17516766
Casarett D, Kutner JS, Abrahm J, et al.: Life after death: a practical approach to grief and bereavement. Ann Intern Med 134 (3): 208-15, 2001.11177334 21091601
Knott JE, Wild E: Anticipatory grief and reinvestment. In: Rando TA, ed.: Loss and Anticipatory Grief. Lexington Books, 1986, pp 55-60.
Johnson J, Lodhi MK, Cheema U, et al.: Outcomes for End-of-Life Patients with Anticipatory Grieving: Insights from Practice with Standardized Nursing Terminologies within an Interoperable Internet-based Electronic Health Record. J Hosp Palliat Nurs 19 (3): 223-231, 2017.28943805
Vergo MT, Whyman J, Li Z, et al.: Assessing Preparatory Grief in Advanced Cancer Patients as an Independent Predictor of Distress in an American Population. J Palliat Med 20 (1): 48-52, 2017.27585066
Corr CA, Nabe CM, Corr DM: Death and Dying, Life and Living. 2nd ed. Brooks/Cole Publishing Company, 1997.
Dionne-Odom JN, Azuero A, Lyons KD, et al.: Family Caregiver Depressive Symptom and Grief Outcomes From the ENABLE III Randomized Controlled Trial. J Pain Symptom Manage 52 (3): 378-85, 2016.27265814
Glick IO, Weiss RS, Parkes CM: The First Year of Bereavement. Wiley-Interscience Publication, 1974.
Parkes CM, Weiss RS: Recovery from Bereavement. Basic Books, 1983.
Burke LA, Clark KA, Ali KS, et al.: Risk Factors for Anticipatory Grief in Family Members of Terminally Ill Veterans Receiving Palliative Care Services. J Soc Work End Life Palliat Care 11 (3-4): 244-66, 2015.26654060
Davis EL, Deane FP, Lyons GCB, et al.: Is Higher Acceptance Associated With Less Anticipatory Grief Among Patients in Palliative Care? J Pain Symptom Manage 54 (1): 120-125, 2017.28479414
Snaman JM, Chen L, Mazzola E, et al.: Family characteristics and childcare patterns associated with early social functioning in cancer-bereaved parents. Cancer 130 (16): 2822-2833, 2024.38620040
Prigerson HG, Maciejewski PK: Rebuilding Consensus on Valid Criteria for Disordered Grief. JAMA Psychiatry 74 (5): 435-436, 2017.28355449
Bowlby J: Attachment and Loss. Volume III: Loss: Sadness and Depression. Basic Books, Inc., 1980.
Parkes CM: Bereavement: Studies of Grief in Adult Life. International Universities Press, Inc., 1972.
Rando TA: The increasing prevalence of complicated mourning: the onslaught is just beginning. Omega (Westport) 26 (1): 43-59, 1992-1993.
Worden JW: Grief Counseling and Grief Therapy: A Handbook for the Mental Health Practitioner. Springer Publishing Company, Inc., 1982.
Kubler-Ross E: On Death and Dying. Macmillan Publishing Company Inc.,1969.
Stroebe M, Schut H, Boerner K: Cautioning Health-Care Professionals. Omega (Westport) 74 (4): 455-473, 2017.28355991
Kübler-Ross E, Kessler D: On Grief and Grieving: Finding the Meaning of Grief Through the Five Stages of Loss. Scribner, 2005.
Bowlby J: Processes of mourning. Int J Psychoanal 42: 317-40, 1961.
Parkes CM: Bereavement: Studies of Grief in Adult Life. 2nd ed. International Universities Press Inc., 1987.
Bowlby J: Attachment and Loss. vols. 1-3. Basic Books, Inc., 1969-1980.
Worden JW: Tasks and mediators of mourning: a guideline for the mental health practitioner. In Session: Psychotherapy in Practice 2 (4): 73-80, 1996.
Worden JW: Grief Counseling and Grief Therapy: A Handbook for the Mental Health Practitioner. 4th ed. Springer Publishing Company, LLC, 2009.
American Psychiatric Association: Diagnostic and Statistical Manual of Mental Disorders: DSM-5. 5th ed. American Psychiatric Association, 2013.
Bonanno GA, Boerner K: The stage theory of grief. JAMA 297 (24): 2693; author reply 2693-4, 2007.17595267
PARKES CM: BEREAVEMENT AND MENTAL ILLNESS. 2. A CLASSIFICATION OF BEREAVEMENT REACTIONS. Br J Med Psychol 38: 13-26, 1965.14300774
Dodd P, Dowling S, Hollins S: A review of the emotional, psychiatric and behavioural responses to bereavement in people with intellectual disabilities. J Intellect Disabil Res 49 (Pt 7): 537-43, 2005.15966961
Maciejewski PK, Maercker A, Boelen PA, et al.: "Prolonged grief disorder" and "persistent complex bereavement disorder", but not "complicated grief", are one and the same diagnostic entity: an analysis of data from the Yale Bereavement Study. World Psychiatry 15 (3): 266-275, 2016.27717273
Shear MK, Reynolds CF, Simon NM, et al.: Optimizing Treatment of Complicated Grief: A Randomized Clinical Trial. JAMA Psychiatry 73 (7): 685-94, 2016.27276373
Robinaugh DJ, LeBlanc NJ, Vuletich HA, et al.: Network analysis of persistent complex bereavement disorder in conjugally bereaved adults. J Abnorm Psychol 123 (3): 510-22, 2014.24933281
Prigerson HG, Horowitz MJ, Jacobs SC, et al.: Prolonged grief disorder: Psychometric validation of criteria proposed for DSM-V and ICD-11. PLoS Med 6 (8): e1000121, 2009.19652695
Prigerson HG, Jacobs SC: Perspectives on care at the close of life. Caring for bereaved patients: "all the doctors just suddenly go". JAMA 286 (11): 1369-76, 2001.11560543
Otani H, Yoshida S, Morita T, et al.: Meaningful Communication Before Death, but Not Present at the Time of Death Itself, Is Associated With Better Outcomes on Measures of Depression and Complicated Grief Among Bereaved Family Members of Cancer Patients. J Pain Symptom Manage 54 (3): 273-279, 2017.28711756
Neria Y, Gross R, Litz B, et al.: Prevalence and psychological correlates of complicated grief among bereaved adults 2.5-3.5 years after September 11th attacks. J Trauma Stress 20 (3): 251-62, 2007.17597124

## Risk Factors for Complicated Grief and Other Negative Bereavement Outcomes

One study [1] of 248 caregivers of terminally ill cancer patients investigated the presence of predeath complicated grief and its correlates. Results revealed the following variables associated with higher levels of predeath complicated grief:

- Age younger than 60 years.
- Lack of perceived available social support.
- History of depression and current depression.
- Lower income.
- Pessimistic thinking.
- Severity of stressful life events.

Of these correlates, pessimistic thinking and severity of stressful life events were independent predictors of predeath complicated grief.

Other research has focused on predictors of outcomes such as symptoms of depression and overall negative health consequences. Three categories of variables have been investigated:

- Situational (e.g., circumstances of the death).
- Personal (e.g., personality characteristics, gender).
- Interpersonal context (e.g., social support, kinship).

Most research has focused on spousal/partner loss and is not uniquely focused on death via cancer.

### Situational: Expected or Unexpected Death

Although theory suggests that a sudden, unexpected loss should lead to more difficult grief, empirical findings have been mixed.[2] The impact of an unexpected loss seems to be moderated by self-esteem and perceived control: Bereaved persons with low self-esteem and/or a sense that life is uncontrollable seem to suffer more depression and somatic complaints after an unexpected death than do bereaved persons with higher self-esteem and/or a sense of control.[2]

### Personal: Personality Characteristics

Attachment theory [3] has suggested that the nature of one’s earliest attachments (typically with parents) predicts how one would react to loss. Bereaved persons with secure attachment styles would be least likely to experience complicated grief, while those with either insecure styles or anxious-ambivalent styles would be most likely to experience negative outcomes.[4]

In a study of 59 caregivers of terminally ill spouses, the nature of their attachment styles and marital quality were evaluated. Results showed that caregivers with insecure attachment styles or in marriages that were “security increasing” were more likely to experience symptoms of complicated grief.[5] Persons with a tendency toward “ruminative coping,” a pattern of excessively focusing on one’s symptoms of distress, have also been shown to experience extended depression after a loss.[6]

### Personal: Religious Beliefs

Theory has proposed that strong religious beliefs and participation in religious activities could provide a buffer to the distress of loss, via two different mechanisms:

- A belief system that helps one cope with death.
- A network of social support that comes with religious participation.

However, empirical results about the benefits of religion in coping with death tend to be mixed, some showing positive benefit and others showing no benefit or even greater distress among the religious.[7] Studies that show a positive benefit of religion tend to measure religious participation as regular church attendance and find that the benefit of participation tends to be associated with an increased level of social support. Thus it appears that religious participation via regular church attendance and the resulting increase in social support may be the mechanisms by which religion is associated with positive grief outcomes.

### Personal: Gender

In general, men experience more negative consequences than women do after losing a spouse. Mortality rates of bereaved men and women are higher for both men and women compared to nonbereaved people; however, the relative increase in mortality is higher for men than for women. Men also tend to experience greater degrees of depression and greater degrees of overall negative health consequences than do women after a spouse’s death.[2] Some researchers have suggested that the mechanism for this difference is the lower level of social support provided to bereaved men than that provided to bereaved women.

### Personal: Age

In general, younger bereaved persons experience more difficulties after a loss than do older bereaved persons. These difficulties include more severe health consequences, grief symptoms, and psychological and physical symptoms,[2] perhaps because younger bereaved persons are more likely to have experienced unexpected and sudden loss. However, it is also thought that younger bereaved persons may experience more difficulties during the initial period after the loss but may recover more quickly because they have more access to various types of resources (e.g., social support) than do older bereaved persons.[2]

### Interpersonal Context: Social Support

Social support is a highly complex construct, consisting of a variety of components (perceived availability, social networks, supportive climate/environment, support seeking) and measured in a variety of ways. However, as mentioned above, lack of social support is a risk factor for negative bereavement outcomes: It is both a general risk factor for negative health outcomes and a bereavement-specific risk factor for negative outcomes after loss.[2] For example, after the death of a close family member (e.g., spouse), many persons report a number of related losses (often unanticipated) such as the loss of income, lifestyle, and daily routine—all important aspects of social support.

### References

Tomarken A, Holland J, Schachter S, et al.: Factors of complicated grief pre-death in caregivers of cancer patients. Psychooncology 17 (2): 105-11, 2008.17443644
Stroebe W, Schut H: Risk factors in bereavement outcome: a methodological and empirical review. In: Stroebe MS, Hansson RO, Stroebe W, et al., eds.: Handbook of Bereavement Research: Consequences, Coping, and Care. American Psychological Association, 2001, 349-71.
Bowlby J: Attachment and Loss. Volume III: Loss: Sadness and Depression. Basic Books, Inc., 1980.
Parkes CM, Weiss RS: Recovery from Bereavement. Basic Books, 1983.
van Doorn C, Kasl SV, Beery LC, et al.: The influence of marital quality and attachment styles on traumatic grief and depressive symptoms. J Nerv Ment Dis 186 (9): 566-73, 1998.9741563
Nolen-Hoeksema S, McBride A, Larson J: Rumination and psychological distress among bereaved partners. J Pers Soc Psychol 72 (4): 855-62, 1997.9108698
Shuchter SR, Zisook S: The course of normal grief. In: Stroebe MS, Stroebe W, Hansson RO, eds.: Handbook of Bereavement: Theory, Research, and Intervention. Cambridge University Press, 1993, pp 23-43.

## Grief Experiences in Medical Providers

Relatively few studies examining grief focus specifically on oncology professionals. Twenty Canadian oncologists were interviewed at different stages in their careers in an empirical study of the impact of grief.[1] The researchers found that oncologists’ grief was uniquely influenced by their responsibility for their patients and, in addition to sadness, included feelings of powerlessness, self-doubt, guilt, and failure. Oncologists described a coping strategy of compartmentalization as well as negative consequences, including effects on treatment decisions and emotional and physical withdrawal from patients. Relational factors associated with a difficult patient loss included:

- Long-term and close relationships with the patients and families.
- Identification with the patient.
- Young patient age.
- Unexpected deaths.

Contextual factors included:

- Unprepared patients and families.
- Unrealistic expectations.
- Excessive treatments.
- Blame by the patient or family or self-blame.
- Chaotic/high-needs families.

Cultural issues included stigma around death and dying, perceived weakness of showing affects, and focus on cure.

A study of Israeli oncologists reported similar findings, but with more attention on close relationships with patients’ families and the impact of the patients’ deaths on children.[2] On the positive side, oncologists have reported that patient deaths have given them a better perspective on life, including what is important to them, and motivation to improve patient care (e.g., limiting excessive treatments at the end of life).[3]

Both male and female physicians in the Canadian study cited above felt that acknowledgment and expression of grief was more culturally acceptable for female physicians than for male physicians,[4] a finding that was also seen in another study.[5] A study examining the effects of gender on grief reactions and burnout among oncologists showed that female oncologists reported more grief and emotional distress in response to patient deaths.[6] Higher levels of grief were associated with greater levels of distress in both men and women who reported high levels of burnout, but this association was also seen at moderate levels of burnout for men, suggesting that men with burnout may be more vulnerable than women to grief and distress.

Another study of Canadian oncologists reported that a number of strategies were used to cope with patient death, including the following:[7]

- Talking or spending time with friends and family.
- Talking with colleagues.
- Hobbies.
- Exercise.
- Outdoor recreation.
- Research.
- Religion.
- Avoiding thoughts about the patient outside of work.

Barriers identified for oncologists in coping with patient deaths include:[5]

- Challenges in accessing family and professional social support.
- Difficulty for men in expressing emotion.
- Difficulty in maintaining emotional boundaries.

### References

Granek L, Tozer R, Mazzotta P, et al.: Nature and impact of grief over patient loss on oncologists' personal and professional lives. Arch Intern Med 172 (12): 964-6, 2012.22732754
Granek L, Ben-David M, Shapira S, et al.: Grief symptoms and difficult patient loss for oncologists in response to patient death. Psychooncology 26 (7): 960-966, 2017.26988940
Granek L, Ariad S, Nakash O, et al.: Mixed-Methods Study of the Impact of Chronic Patient Death on Oncologists' Personal and Professional Lives. J Oncol Pract 13 (1): e1-e10, 2017.28084882
Granek L, Krzyzanowska MK, Tozer R, et al.: Difficult patient loss and physician culture for oncologists grieving patient loss. J Palliat Med 15 (11): 1254-60, 2012.23016965
Granek L, Ariad S, Shapira S, et al.: Barriers and facilitators in coping with patient death in clinical oncology. Support Care Cancer 24 (10): 4219-27, 2016.27146494
Granek L, Krzyzanowska MK, Nakash O, et al.: Gender differences in the effect of grief reactions and burnout on emotional distress among clinical oncologists. Cancer 122 (23): 3705-3714, 2016.27509210
Granek L, Barbera L, Nakash O, et al.: Experiences of Canadian oncologists with difficult patient deaths and coping strategies used. Curr Oncol 24 (4): e277-e284, 2017.28874898

## Treatment

The following information concerns treatment of grief after the death of a loved one, not necessarily death as a result of cancer.

### Normal or Common Grief Reactions

Some controversy continues about whether normal or common grief reactions require any intervention by medical or mental health professionals. Researchers disagree about whether credible evidence on the efficacy of grief counseling exists.[1-4] Most bereaved persons experience painful and often very distressing emotional, physical, and social reactions; however, most researchers agree that most bereaved persons adapt over time, typically within the first 6 months to 2 years. Thus, the question is whether it is wise to devote professional time to interventions for normal grief when resources are limited and the need for accountability is great.

One approach is to use a spectrum of interventions, from prevention to treatment to long-term maintenance care.[5] In this model, preventive interventions could be one of the following:

- Universal and targeted to all persons in the population.
- Selective and targeted to persons with known risk factors.
- Indicated for persons experiencing significant symptom distress.

In contrast, formal treatment of bereaved persons would be reserved for those identified as experiencing complicated or pathologic grief reactions. Finally, longer-term maintenance care may be warranted for persons experiencing chronic grief reactions.

Another approach has focused on families.[6,7] This brief, time-limited approach (four to eight 90-minute sessions over 9 to 18 months) identifies families at increased risk for poor outcomes and intervenes, with emphasis on improving family cohesion, communication, and conflict resolution. Adaptive coping, with efforts to strengthen family solidarity, and frequent affirmation of family strengths are emphasized.

In a randomized controlled trial,[8][Level of evidence: I] 183 (71%) of 257 families screened were identified as at risk for poor outcomes; 81 (44%) of these at-risk families participated in the trial. Family functioning was classified into one of five groups:

- Two functional groups:
  - Supportive families.
  - Conflict-resolving families.
- Three potentially dysfunctional groups:
  - Sullen families.
  - Hostile families.
  - Intermediate-functioning families.

Participants classified as hostile (n = 19), sullen (n = 21), or intermediate (n = 41) were randomly assigned to either the treatment group or a no-treatment control group.[8]

Results showed modest reductions in distress at 13 months postdeath for all participants, with more significant reductions in distress and depression in family members who had initially higher baseline scores on the Brief Symptom Inventory and Beck Depression Inventory.[8] Overall, global family functioning did not change, yet participants classified as sullen or intermediate showed more improvement than did those classified as hostile. Results recommend caution in dealing with hostile families to avoid increasing intrafamily conflict.[8]

### Psychosocial Treatment of Complicated Grief

With the development of proposed diagnostic criteria for complicated grief (i.e., prolonged grief disorder), targeted interventions have been tested in several randomized controlled trials. These studies are of interventions for bereaved persons whose loved ones died from mixed (not necessarily cancer-related) causes.

Complicated grief is characterized by maladaptive thoughts and behaviors. Psychosocial interventions focus on these aspects of complicated grief and use cognitive-behavioral strategies to directly impact grief-related thoughts and behaviors. Such grief-focused interventions are adaptations of cognitive-behavioral therapy (CBT) and incorporate strategies such as exposure therapy and cognitive restructuring [9][Level of evidence: II]; [10] or integration of certain aspects of interpretive therapy [11,12] or interpersonal therapy [13][Level of evidence: I] in the CBT sessions.

Table 1 describes the interventions that have shown promise in randomized controlled trials. The interventions are adaptations of CBT but are specifically designed to treat complicated grief. These interventions include individual therapy, group therapy, and therapy sessions delivered via the Internet. Participants in these studies met criteria for complicated grief. Control conditions included active controls (such as interpersonal therapy or supportive counseling) or wait-list controls with delayed treatment.

Table 1. Randomized Controlled Trials of Interventions for Complicated Grief

Reference Citation | Intervention | Control | Sample | Mean Age (y) | Primary Outcome Measure | Results
Shear et al., 2014 [14] | Individual therapy; CGT: CBT + elements of IPT; 16 wkly manual-based sessions | IPT; 16 wkly sessions | N = 151, older patients only (age ≥60 y) | 66.1 | CGI scale | Response rate of CGT group (70.5%) was more than twice that of IPT group (32.0%).
Shear et al., 2005 [13] | Individual therapy; CGT: CBT + elements of IPT; 16 wkly manual-based sessions | IPT; 16 wkly sessions | N = 102 | 48 | CGI scale | Response rate of CGT group (51%) was twice that of IPT group (27%).
Boelen et al., 2007 [9] | Individual therapy; CBT + elements of ET, and CBT + elements of CR; 12 wkly manual-based sessions | SC; 12 wkly sessions | N = 54 | 44 | ICG scale | Both CBT groups (ET and CR) showed better response than SC group. ET was better than CR.
Rosner et al., 2014 [15] | Individual therapy; PG-CBT: CBT + psychoeducation on prolonged grief + elements of ET; 20–25 wkly manual-based sessions | Wait list (delayed treatment) | N = 51 | 47.5 | PG-13 scale | For grief and other outcomes, PG-CBT group showed significant improvement compared with control group.
Piper et al., 2007 [12] | Group therapy; time-limited, short-term interpretive therapy focused on enhancing patient insights about conflicts and trauma associated with loss | Group therapy; supportive, short-term | N = 135 | 45.2 | ICG, IES, and TRIG | Both groups showed improvement. Groups with higher percentage of patients with mature relationships showed better improvement.
Wagner et al., 2006 [16] | Internet-based CBT + elements of exposure to bereavement cues and CR; 5-wk intervention with 2 wkly sessions | Wait list (delayed treatment) | N = 55 | 37 | IES and failure-to-adapt scale | Significant improvement for all outcomes in Internet-based CBT group compared with control group, at end of treatment and 3 mo posttreatment.

CBT = cognitive behavioral therapy; CGI = Clinical Global Impression; CGT = complicated grief treatment; CR = cognitive restructuring; ET = exposure therapy; ICG= Inventory of Complicated Grief; IES = Impact of Event Scale; IPT = interpersonal psychotherapy; PG-13 = prolonged grief–13; PG-CBT = integrative cognitive behavioral therapy for prolonged grief; SC = supportive counseling; TRIG = Texas Revised Inventory of Grief.

### Pharmacological Treatment of Bereavement-Related Depression

The clinical decision on whether to provide pharmacological treatment for depressive symptoms in the context of bereavement is controversial and not extensively studied. Some health care professionals argue that distinguishing the sadness and distress of normal grief from the sadness and distress of depression is difficult, and pharmacological treatment of a normal emotional process is not warranted. However, three open-label trials and two randomized controlled trials have demonstrated that antidepressant treatment can improve depression symptomatology associated with bereavement (see Table 2).

The open-label trials evaluated desipramine,[17] nortriptyline,[18] and bupropion sustained release in patients experiencing grief with depression symptoms after the deaths of their loved ones.[19][Level of evidence: II]

Data from these studies suggest that antidepressants are well tolerated and improve symptoms of depression with limited impact on grief intensity. The intensity of grief improved in these studies, but it was substantially less compared to improvement in depression symptoms. Limitations of these studies include open-label treatment and small sample sizes.

Two randomized controlled trials investigated combined treatment—antidepressant treatment combined with grief-directed psychotherapy—in bereaved individuals with comorbid depression symptoms.[20][Level of evidence: I]; [21] These studies compared the combined treatment with antidepressant alone, placebo alone, and psychotherapy with placebo. Both trials showed that the combined treatment had the best overall outcomes compared with all other groups (see Table 2).

One randomized controlled study [20][Level of evidence: I] compared nortriptyline with placebo for the treatment of bereavement-related major depressive episodes. Nortriptyline was compared with two other treatments, one combining nortriptyline with interpersonal psychotherapy (IPT) and the other combining placebo with IPT. Eighty subjects, aged 50 years or older, were randomly assigned to one of the four treatment groups: nortriptyline (n = 25), placebo (n = 22), nortriptyline plus IPT (n = 16), and placebo plus IPT (n = 17).

The 17-item Hamilton Depression Rating Scale (HDRS) was used to assess depressive symptoms. Remission was defined as a score of 7 or lower for 3 consecutive weeks. The remission rates for the four groups were as follows: nortriptyline alone, 56%; placebo alone, 45%; nortriptyline plus IPT, 69%; placebo plus IPT, 29%. Nortriptyline was superior to placebo in achieving remission (P < .03).[20]

The combination of nortriptyline with IPT was associated with the highest remission rate and highest rate of treatment completion. The study did not show a difference between IPT and placebo, possibly owing to specific aspects of the study design, including short duration of IPT (mean no. of days, 49.5) and small sample size.[20] The high remission rate with placebo was another important limitation of the study. Consistent with previous open-label studies and for all four groups, improvement in grief intensity was less than improvement in depressive symptoms.

Another randomized controlled study (N = 395) enrolled patients with complicated grief and investigated the antidepressant citalopram and complicated grief treatment (CGT) to treat grief intensity and comorbid depression symptoms.[21] Four treatment groups were compared: citalopram alone (n = 101), placebo alone (n = 99), citalopram with CGT (n = 99), and CGT with placebo (n = 96). All participants received pharmacotherapy following a specific protocol, and participants in the CGT groups received manual-based CGT in 16 concurrent weekly sessions. The primary outcome measure was a complicated grief–anchored Clinical Global Impression (CGI) scale. Depressive symptomatology was measured using the Quick Inventory of Depressive Symptomatology–Self-Report (QIDS-SR) questionnaire.

Grief-intensity responses for the four groups were as follows: placebo alone, 54.8%; citalopram alone, 69.3%; CGT plus placebo, 82.5%; and citalopram plus CGT, 83.7%. Participants’ response in the CGT-plus-placebo group was substantially better than that in the placebo-alone group (82.5% vs. 54.8%), showing the efficacy of CGT as a treatment for complicated grief. The addition of citalopram to CGT did not significantly improve grief outcomes (citalopram plus CGT vs. CGT plus placebo, 83.7% vs. 82.5%). However, the addition of citalopram to CGT led to a significant decrease in comorbid depression symptoms compared to the CGT-plus-placebo group. Notably, adding CGT to citalopram substantially improved grief-intensity outcomes (citalopram plus CGT vs. citalopram alone, 83.7% vs. 69.3%), suggesting the importance of CGT as the primary treatment for the complicated grief process.[21]

In summary, the antidepressant studies conducted to date suggest that combining antidepressant treatment with grief-directed therapy is necessary, especially for patients struggling with complicated grief with comorbid depressive symptomatology. Antidepressants alone have a limited impact on grief intensity but are critical to reduce depressive symptomatology. Combining antidepressants with grief-directed therapy improves both depression symptoms and grief intensity.

Table 2. Randomized Controlled Studies Investigating Combined Pharmacological and Psychotherapeutic Treatments for Complicated Grief With Comorbid Depression Symptomatology

Reference Citation | Intervention | Subjects | Age (y) | Treatment Groups | Results
Reynolds et al., 1999 [20]^a^ | NTP and IPT | 58 women, 22 men | Mean range for 4 groups, 63.2–69.5 | NTP alone vs. PLA alone vs. NTP+IPT vs. PLA+IPT | NTP+IPT group had highest remission rate and lowest attrition rate.
Shear et al., 2016 [21]^a^ | CIT and CGT | 308 women, 87 men | Mean range for 4 groups, 52.1–53.9 | CIT alone vs. PLA alone vs. CIT+CGT vs. CGT+PLA | CIT+CGT group had highest response rate. Addition of CIT to CGT had minimal further impact on grief intensity but led to statistically significant reduction in depression.

CGT = complicated grief treatment; CIT = citalopram; IPT = interpersonal psychotherapy; NTP = nortriptyline; PLA = placebo.

^a^See text for details.

### References

Larson DG, Hoyt WT: What has become of grief counseling? An evaluation of the empirical foundations of the new pessimism. Prof Psychol Res Pr 38 (4): 347-55, 2007.
Bonanno GA, Lilienfeld SO: Let's be realistic: when grief counseling is effective and when it's not. Prof Psychol Res Pr 39 (3): 377-8, 2008.
Hoyt WT, Larson DG: A realistic approach to drawing conclusions from the scientific literature: response to Bonanno and Lilienfeld. Prof Psychol Res Pr 39 (3): 378-9, 2008.
Jordan JR, Neimeyer RA: Does grief counseling work? Death Stud 27 (9): 765-86, 2003.14577426
Mrazek PJ, Haggerty RJ, eds.: Reducing Risks for Mental Disorders: Frontiers for Preventive Intervention Research. National Academy Press, 1994.
Kissane DW, Lichtenthal WG: Family focused grief therapy: from palliative care into bereavement. In: Stroebe MS, Hansson RO, Schut H, et al., eds.: Handbook of Bereavement Research and Practice: Advances in Theory and Intervention. American Psychological Association, 2008, pp 485-510.
Kissane DW, Bloch S: Family Focused Grief Therapy: A Model of Family-Centered Care During Palliative Care and Bereavement. Open University Press, 2002.
Kissane DW, McKenzie M, Bloch S, et al.: Family focused grief therapy: a randomized, controlled trial in palliative care and bereavement. Am J Psychiatry 163 (7): 1208-18, 2006.16816226
Boelen PA, de Keijser J, van den Hout MA, et al.: Treatment of complicated grief: a comparison between cognitive-behavioral therapy and supportive counseling. J Consult Clin Psychol 75 (2): 277-84, 2007.17469885
Rosner R, Pfoh G, Kotoučová M: Treatment of complicated grief. Eur J Psychotraumatol 2: , 2011.22893810
Piper WE, McCallum M, Joyce AS, et al.: Patient personality and time-limited group psychotherapy for complicated grief. Int J Group Psychother 51 (4): 525-52, 2001.11582899
Piper WE, Ogrodniczuk JS, Joyce AS, et al.: Group composition and group therapy for complicated grief. J Consult Clin Psychol 75 (1): 116-25, 2007.17295570
Shear K, Frank E, Houck PR, et al.: Treatment of complicated grief: a randomized controlled trial. JAMA 293 (21): 2601-8, 2005.15928281
Shear MK, Wang Y, Skritskaya N, et al.: Treatment of complicated grief in elderly persons: a randomized clinical trial. JAMA Psychiatry 71 (11): 1287-95, 2014.25250737
Rosner R, Pfoh G, Kotoučová M, et al.: Efficacy of an outpatient treatment for prolonged grief disorder: a randomized controlled clinical trial. J Affect Disord 167: 56-63, 2014.25082115
Wagner B, Knaevelsrud C, Maercker A: Internet-based cognitive-behavioral therapy for complicated grief: a randomized controlled trial. Death Stud 30 (5): 429-53, 2006.16610157
Jacobs SC, Nelson JC, Zisook S: Treating depressions of bereavement with antidepressants. A pilot study. Psychiatr Clin North Am 10 (3): 501-10, 1987.3684751
Pasternak RE, Reynolds CF, Schlernitzauer M, et al.: Acute open-trial nortriptyline therapy of bereavement-related depression in late life. J Clin Psychiatry 52 (7): 307-10, 1991.2071562
Zisook S, Shuchter SR, Pedrelli P, et al.: Bupropion sustained release for bereavement: results of an open trial. J Clin Psychiatry 62 (4): 227-30, 2001.11379835
Reynolds CF, Miller MD, Pasternak RE, et al.: Treatment of bereavement-related major depressive episodes in later life: a controlled study of acute and continuation treatment with nortriptyline and interpersonal psychotherapy. Am J Psychiatry 156 (2): 202-8, 1999.9989555
Shear MK, Reynolds CF, Simon NM, et al.: Optimizing Treatment of Complicated Grief: A Randomized Clinical Trial. JAMA Psychiatry 73 (7): 685-94, 2016.27276373

## Children and Grief

At one time, children were considered miniature adults, and their behaviors were expected to be modeled as such.[1] Today there is a greater awareness of developmental differences between childhood and other developmental stages in the human life cycle. Differences between the grieving process for children and the grieving process for adults are recognized. It is now believed that the real issue for grieving children is not whether they grieve, but how they exhibit their grief and mourning.[1]

The primary difference between bereaved adults and bereaved children is that intense emotional and behavioral expressions are not continuous in children. A child’s grief may appear more intermittent and briefer than that of an adult; in fact, a child’s grief usually lasts longer.[1-3]

The work of mourning in childhood needs to be addressed repeatedly at different developmental and chronological milestones. Because bereavement is a process that continues over time, children will revisit the loss repeatedly, especially during significant life events (e.g., going to camp, graduating from school, marrying, and experiencing the births of their own children). Children must complete the grieving process, eventually achieving resolution of grief.

Although the experience of loss is unique and highly individualized, several factors can influence a child’s grief:[2-4]

- Age.
- Personality.
- Stage of development.
- Previous experiences with death.
- Previous relationship with the deceased.
- Environment.
- Cause of death.
- Patterns of interaction and communication within the family.
- Stability of family life after the loss.
- How the child’s needs for sustained care are met.
- Availability of opportunities to share and express feelings and memories.
- Parental styles of coping with stress.
- Availability of consistent relationships with other adults.

Children do not react to loss like adults do and may not display their feelings as openly as adults do. In addition to verbal communication, grieving children may employ play, drama, art, school work, and stories.[5] Bereaved children may not withdraw into preoccupation with thoughts of the deceased person; they often immerse themselves in activities (e.g., they may be sad one minute and then playing outside with friends the next). Families often incorrectly interpret this behavior to mean the child does not really understand or has already gotten over the death. Neither assumption may be true; children’s minds protect them from thoughts and feelings that are too powerful for them to handle.

Grief reactions are intermittent because children cannot explore all of their thoughts and feelings as rationally as adults can. Additionally, children often have difficulty articulating their feelings about grief. A grieving child’s behavior may speak louder than any words he or she could speak. Strong feelings of anger and fear of abandonment or death may be evident in the behaviors of grieving children. Children often play death games as a way of working out their feelings and anxieties in a relatively safe setting. These games are familiar to the children and provide safe opportunities to express their feelings.[1,2]

### Grief and Developmental Stages

A child’s understanding of death and the events surrounding it depends on the child’s age and developmental stage (see Table 3).

#### Infants

Although infants do not recognize death, feelings of loss and separation are part of a developing awareness of death. Children who have been separated from their mothers and deprived of nurturing can exhibit changes such as listlessness, quietness, unresponsiveness to a smile or a coo, physical changes (including weight loss), and a decrease in activity and lack of sleep.[6]

#### Ages 2 to 3 years

In this age range, children often confuse death with sleep and can experience anxiety. In the early phases of grief, bereaved children can exhibit loss of speech and generalized distress.[3,6]

#### Ages 3 to 6 years

In this age range, children view death as a kind of sleep: the person is alive, but in some limited way. They do not fully separate death from life and may believe that the deceased continues to live (for instance, in the ground where he or she was buried), and they often ask questions about the activities of the deceased person (e.g., how is the deceased eating, going to the toilet, breathing, or playing?). Young children can acknowledge physical death but consider it a temporary or gradual event, reversible and not final (like leaving and returning, or a game of peek-a-boo). A child’s concept of death may involve magical thinking, i.e., the idea that his or her thoughts can cause actions. Children may feel that they must have done or thought something bad to cause a loved one to become ill or that a loved one’s death occurred because of the child’s personal thought or wish. In response to death, children younger than 5 years will often exhibit disturbances in eating, sleeping, and bladder or bowel control.[3,6]

#### Ages 6 to 9 years

It is not unusual for children in this age range to become very curious about death, asking very concrete questions about what happens to one’s body when it stops working. Death is personified as a separate person or spirit: a skeleton, ghost, angel of death, or bogeyman. Although death is perceived as final and frightening, it is not universal. Children in this age range begin to compromise, recognizing that death is final and real but mostly happens to older people (not to themselves). Grieving children can:

- Develop school phobias, learning problems, and antisocial or aggressive behaviors.
- Exhibit hypochondriacal concerns.
- Withdraw from others.

Conversely, children in this age range can become overly attentive and clinging. Boys may show an increase in aggressive and destructive behavior (e.g., acting out in school), expressing their feelings in this way rather than by openly displaying sadness. When a parent dies, children may feel abandoned by both their deceased parent and their surviving parent because the surviving parent is frequently preoccupied with his or her own grief and is less able to emotionally support the child.[3,6]

#### Ages 9 years and older

By the time a child is 9 years old, death is understood as inevitable and is no longer viewed as a punishment. By the time the child is 12 years old, death is viewed as final and universal.[3,6]

Table 3. Grief and Developmental Stages

Age (y) | Understanding of Death | Expressions of Grief
0–2 | Is not yet able to understand death. | Quietness, crankiness, decreased activity, poor sleep, and weight loss.
0–2 | Separation from mother causes changes. | Quietness, crankiness, decreased activity, poor sleep, and weight loss.
2–6 | Death is like sleeping. | Asks many questions (How does she go to the bathroom? How does he eat?).
2–6 | Death is like sleeping. | Problems in eating, sleeping, and bladder and bowel control.
2–6 | Death is like sleeping. | Fear of abandonment.
2–6 | Death is like sleeping. | Tantrums.
2–6 | Dead person continues to live and function in some ways. | Magical thinking (Did I think something or do something that caused the death? Like when I said I hate you and I wish you would die?).
2–6 | Death is temporary, not final. | Magical thinking (Did I think something or do something that caused the death? Like when I said I hate you and I wish you would die?).
2–6 | Dead person can come back to life. | Magical thinking (Did I think something or do something that caused the death? Like when I said I hate you and I wish you would die?).
6–9 | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | Curious about death.
6–9 | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | Asks specific questions.
6–9 | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | May have exaggerated fears about school.
6–9 | Death is final and frightening. | May have aggressive behaviors (especially boys).
6–9 | Death is final and frightening. | Some concerns about imaginary illnesses.
6–9 | Death happens to others; it will not happen to ME. | May feel abandoned.
≥9 | Everyone will die. | Heightened emotions, guilt, anger, shame.
≥9 | Everyone will die. | Increased anxiety over own death.
≥9 | Everyone will die. | Mood swings.
≥9 | Death is final and cannot be changed. | Fear of rejection; not wanting to be different from peers.
≥9 | Even I will die. | Changes in eating habits.
≥9 | Even I will die. | Sleeping problems.
≥9 | Even I will die. | Regressive behaviors (loss of interest in outside activities).
≥9 | Even I will die. | Impulsive behaviors.
≥9 | Even I will die. | Feels guilty about being alive (especially related to death of a sibling or peer).

In American society, many grieving adults withdraw into themselves and limit communication. In contrast, children often talk to those around them (even strangers) as a way of watching for reactions and seeking clues to help guide their own responses. It is not uncommon for children to repeatedly ask baffling questions. For example, a child may ask, “I know Grandpa died, but when will he come home?” This is thought to be a way of testing reality for the child and confirming the story of the death.

#### Issues for grieving children

There are three prominent themes in the grief expressions of bereaved children:

1. Did I cause the death to happen?
2. Is it going to happen to me?
3. Who is going to take care of me?[2,7]

Did I cause the death to happen?

Children often engage in magical thinking, believing they have magical powers. If a mother says in exasperation, “You’ll be the death of me,” and later dies, her child may wonder whether he or she actually caused the death. Likewise, when two siblings argue, it is not unusual for one to say (or think), “I wish you were dead.” If that sibling were to die, the surviving sibling might think that his or her thoughts or statements actually caused the death.

Is it going to happen to me?

The death of a sibling or other child may be especially difficult because it strikes so close to the child’s own peer group. If the child also perceives that the death could have been prevented (by either a parent or doctor), the child may think that he or she could also die.

Who is going to take care of me?

Because children depend on parents and other adults for their safety and welfare, a child who is grieving the death of an important person in his or her life might begin to wonder who will provide the care that he or she needs now that the person is gone.

### Interventions for Grieving Children

There are interventions that may help to facilitate and support the grieving process in children.

#### Explanation of death

Silence about death (which indicates that the subject is taboo) does not help children deal with loss. When death is discussed with a child, explanations should be kept as simple and direct as possible. Each child needs to be told the truth with as much detail as can be comprehended at his or her age and stage of development. Questions should be addressed honestly and directly. Children need to be reassured about their own security (they frequently worry that they will also die or that their surviving parent will go away). A child’s questions should be answered, and the child’s processing of the information should be confirmed.

#### Correct language

Although initiating this conversation with children is difficult, any discussion about death must include proper words (e.g., cancer, died, or death). Euphemisms (e.g., “he passed away,” “he is sleeping,” or “we lost him”) should never be used because they can confuse children and lead to misinterpretations.[3,8]

#### Planning rituals

After a death occurs, children can and should be included in the planning of and participation in mourning rituals. As with bereaved adults, these rituals help children memorialize loved ones. Although children should never be forced to attend or participate in mourning rituals, their participation should be encouraged. Children can be encouraged to participate in aspects of the funeral or memorial service with which they feel comfortable. If the child wants to attend the funeral (or wake or memorial service), it is important that a full explanation of what to expect is given in advance. This preparation should include the layout of the room, who might be present (e.g., friends and family members), what the child will see (e.g., a casket and people crying), and what will happen. Surviving parents may be too involved in their own grief to give their children the attention they need. Therefore, it is often helpful to identify a familiar adult friend or family member who will be assigned to care for a grieving child during a funeral.[8]

### References

O'Toole D, Cory J: Helping Children Grieve and Grow: a Guide for Those Who Care. Compassion Books, 1998.
Corr CA, Nabe CM, Corr DM: Death and Dying, Life and Living. 2nd ed. Brooks/Cole Publishing Company, 1997.
Fitzgerald H: The Grieving Child: A Parent's Guide. Fireside, 1992.
DeSpelder LA, Strickland AL: The Last Dance: Encountering Death and Dying. 4th ed. Mayfield Publishing Company, 1996.
Goldman A: ABC of palliative care. Special problems of children. BMJ 316 (7124): 49-52, 1998.9451269 98113099
Burnell GM, Burnell AL: Clinical Management of Bereavement: A Handbook for Healthcare Professionals. Human Sciences Press, Inc., 1989.
Worden JW: Children and Grief: When a Parent Dies. The Guilford Press, 1996.
Kastenbaum R: Death, Society, and Human Experience. Allyn and Bacon, 1995.

## Cross-Cultural Responses to Grief and Mourning

Grief—whether in response to the death of a loved one, to the loss of a treasured possession, or to a significant life change—is a universal occurrence that crosses all ages and cultures.[1,2] Attitudes, beliefs, and practices regarding death and grief are characterized and described according to the multicultural context, myth, mysteries, and mores that describe cross-cultural relationships.[2]

In a Japanese study, the concept of unfinished business with a family member resulted in higher depression and grief scores compared with those who felt there was no unfinished business with the patient at the time of his or her death.[3] Unfinished business can include insufficient discussions about death and end-of-life wishes because of discomfort with discussing such topics with the family member.[4]

The potential for contradiction between an individual’s intrapersonal experience of grief and his or her cultural expression of grief can be explained by the prevalent (though incorrect) synonymous use of the terms grief (the highly personalized process of experiencing reactions to perceived loss) and mourning (the socially or culturally defined behavioral displays of grief).[5,6]

An analysis of the results of several focus groups, each consisting of individuals from a specific culture, revealed that individual, intrapersonal experiences of grief are similar across cultural boundaries. This is true even considering the culturally distinct mourning rituals, traditions, and behavioral expressions of grief experienced by the participants. Health care professionals need to understand the part that may be played by cultural mourning practices in an individual’s overall grief experience if they are to provide culturally sensitive care to their patients.[1]

In spite of legislation, health regulations, customs, and work rules that have greatly influenced how death is managed in the United States, bereavement practices vary in profound ways depending on one’s cultural background. When assessing an individual’s response to the death of a loved one, clinicians should identify and appreciate what is expected or required by the person’s culture. Failing to carry out expected rituals can lead to an experience of unresolved loss for family members.[7] This is often a daunting task when health care professionals serve patients of many ethnicities.[2]

Helping family members cope with the death of a loved one includes showing respect for the family’s cultural heritage and encouraging them to decide how to commemorate the death. Clinicians consider the following five questions particularly important to ask those who are coping with the emotional aftermath of the death of a loved one:

1. What are the culturally prescribed rituals for managing the dying process, the body of the deceased, the disposal of the body, and commemoration of the death?
2. What are the family’s beliefs about what happens after death?
3. What does the family consider an appropriate emotional expression and integration of the loss?
4. What does the family consider to be the gender rules for handling the death?
5. Do certain types of death carry a stigma (e.g., suicide), or are certain types of death especially traumatic for that cultural group (e.g., death of a child)?[8]

Death, grief, and mourning are universal and natural aspects of the life process. All cultures have evolved practices that best meet their needs for dealing with death. Hindering these practices can disrupt the necessary grieving process. Understanding these practices can help clinicians identify and develop ways to treat patients of other cultures who are demonstrating atypical grief.[9] Given ethnodemographic trends, health care professionals need to address these cultural differences to best serve these populations.[2]

### References

Cowles KV: Cultural perspectives of grief: an expanded concept analysis. J Adv Nurs 23 (2): 287-94, 1996.8708241 96209065
Irish DP, Lundquist KF, Nelson VJ, eds.: Ethnic Variations in Dying, Death, and Grief: Diversity in Universality. Taylor & Francis, 1993.
Yamashita R, Arao H, Takao A, et al.: Unfinished Business in Families of Terminally Ill With Cancer Patients. J Pain Symptom Manage 54 (6): 861-869, 2017.28807700
Mori M, Yoshida S, Shiozaki M, et al.: Talking About Death With Terminally-Ill Cancer Patients: What Contributes to the Regret of Bereaved Family Members? J Pain Symptom Manage 54 (6): 853-860.e1, 2017.28797852
Rando TA: Treatment of Complicated Mourning. Research Press, 1993.
Cowles KV, Rodgers BL: The concept of grief: a foundation for nursing research and practice. Res Nurs Health 14 (2): 119-27, 1991.1842669 91262109
McGoldrick M, Hines P, Lee E, et al.: Mourning rituals. Family Therapy Networker 10 (6): 28-36, 1986.
McGoldrick M, Almedia R, Hines PM, et al.: Mourning in different cultures. In: Walsh F, McGoldrick M, eds.: Living Beyond Loss: Death in the Family. W.W. Norton & Company, 1991, pp 176-206.
Eisenbruch M: Cross-cultural aspects of bereavement. II: Ethnic and cultural variations in the development of bereavement practices. Cult Med Psychiatry 8 (4): 315-47, 1984.6499505 85050321

## Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (06/26/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Types of Grief Reactions

Added text about a study that reported that parents who felt prepared for their child’s end of life had improved social functioning in the first 2 years of their bereavement (cited Snaman et al. as reference 18).

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about how individuals cope with grief, bereavement, and mourning. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Grief, Bereavement, and Coping With Loss are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- Natalie Jacobowski, MD (Nationwide Children's Hospital)
- Jayesh Kamath, MD, PhD (University of Connecticut Health Center)
- Edward B. Perry, MD (VA Connecticut Healthcare System)
- Amy Wachholtz, PhD, MDiv, MS, ABPP (University of Colorado)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Grief, Bereavement, and Coping With Loss. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/planning/bereavement-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389487]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).